# Curcumin (Curcuma, Turmeric) and Cancer (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the use of curcumin in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board.

## Overview

- Curcumin is a substance that comes from the underground stem of Curcuma longa, an East Indian plant. It is contained in a spice commonly called turmeric (see Question 1).
- The turmeric plant has been used for many years in traditional Asian medicine to treat many conditions (see Question 1).
- Curcumin can be found in curry powder, taken as a dried extract in pill form, or made into a paste (see Question 2).
- Few side effects have been reported from the use of curcumin products (see Question 5).
- The U.S. Food and Drug Administration (FDA) has not approved curcumin as a treatment for cancer or any other medical condition (see Question 6).

## Questions and Answers About Curcumin

1. What is curcumin?
  Curcumin is a substance that comes from the underground stem of Curcuma longa, an East Indian plant. It is contained in a spice commonly called turmeric. The turmeric plant has been used for many years in traditional Asian medicine to treat many conditions.
  Curcumin comes in different forms. The amount of curcumin in each product labeled as curcumin can vary, making it hard to know how much to use to treat medical conditions.
2. How is curcumin taken or given?
  Curcumin is taken by mouth as a dietary supplement. It is also found in curry powder, as a major part of turmeric. Curcumin can also be made into a paste to treat skin conditions.
3. Have any laboratory or animal studies been done using curcumin?
  In laboratory studies, a substance is tested in tumor cells to find out if it has any anticancer effects. In animal studies, a drug, procedure, or treatment is tested in mice or other animals to see if it is safe and effective in animals. Laboratory and animal studies are done before a substance is tested in people.
  Laboratory and animal studies have tested the effects of curcumin. For information on laboratory and animal studies done using curcumin, see Laboratory/Preclinical Studies in the health professional version of this summary.
4. Have any studies of curcumin been done in people?
  Early phase trials have been done with small numbers of people to see if curcumin products are safe and work in the following ways:
  - To prevent cancer.
  - To treat cancer.
  - To improve quality of life.
  - To manage cancer treatment–related side effects.
  Researchers have looked at curcumin products for the prevention and treatment of a variety of cancers, including colorectal cancer, oral cancer, and liver cancer. There is not enough evidence to know if curcumin products can prevent or treat cancer.
  Cancer prevention and treatment trials
  - One study looked at the impact of oral curcumin on lesions in the lining of the colon and the rectum known as aberrant crypt foci (ACF). These lesions can be early warning signs of polyps and colorectal cancer. Although patients who received curcumin saw a decrease in ACF, the differences were not significant when compared to the group who did not receive curcumin.
  - A randomized trial looked at the use of an oral curcumin product in 223 patients with oral leukoplakia (thick white patches in the mouth). Compared to the placebo group, patients who received the curcumin product showed improved conditions that were maintained at 6 months. No further benefit was seen with treatment that lasted longer than 6 months.
  - Results from a study of 102 patients with nonalcoholic fatty liver disease (NAFLD) showed that a curcumin product was linked with reduced body mass index and waist size. Many patients who took the curcumin product showed improved liver ultrasound findings and biomarkers of liver inflammation in the blood, compared to the control group.
  - A later study that combined results from four randomized controlled trials of 228 patients with NAFLD who took curcumin products showed similar results for biomarkers of liver inflammation.
  - Results of studies that used curcumin products with traditional cancer treatments have been mixed. Studies of people with adrenocortical cancer, breast cancer, prostate cancer, pancreatic cancer, or colorectal cancer have shown improved results when using a curcumin product as an adjuvant therapy. Other studies did not show an improvement in disease. For more information on these study results, see the Cancer Treatment section in the health professional version of this summary.
  Curcumin products have been studied in early phase trials to find out their impact on cancer treatment–related side effects and quality of life.
  Cancer treatment–related side effects trials
  - Although studies have been mixed on oral curcumin given to treat radiation-induced dermatitis, a small study reported a topical cream that contained turmeric reduced dermatitis from radiation therapy.
  - Delayed onset and severity of mucositis (often seen as sores in the mouth) has been reported in trials that used a mouthwash product or oral capsule that had curcumin in it.
5. Have any side effects or risks been reported from curcumin?
  Few side effects have been reported from the use of products with curcumin. The most common complaint is digestive problems. A small study of patients who took a curcumin product with an anticancer drug found that one in three people stopped using the curcumin product because of constant bloating.
6. Is curcumin approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of curcumin as a treatment for cancer or any other medical condition.
  Curcumin is available in the United States as a dietary supplement. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of curcumin supplements may not be the same.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the use of curcumin in the treatment of people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Curcumin (Curcuma, Turmeric) and Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/patient/curcumin-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).

## General CAM Information

Complementary and alternative medicine (CAM)—also called integrative medicine—includes a broad range of healing philosophies, approaches, and therapies. A therapy is generally called complementary when it is used in addition to conventional treatments; it is often called alternative when it is used instead of conventional treatment. (Conventional treatments are those that are widely accepted and practiced by the mainstream medical community.) Depending on how they are used, some therapies can be considered either complementary or alternative. Complementary and alternative therapies are used in an effort to prevent illness, reduce stress, prevent or reduce side effects and symptoms, or control or cure disease.

Unlike conventional treatments for cancer, complementary and alternative therapies are often not covered by insurance companies. Patients should check with their insurance provider to find out about coverage for complementary and alternative therapies.

Cancer patients considering complementary and alternative therapies should discuss this decision with their doctor, nurse, or pharmacist as they would any type of treatment. Some complementary and alternative therapies may affect their standard treatment or may be harmful when used with conventional treatment.

## Evaluation of CAM Therapies

It is important that the same scientific methods used to test conventional therapies are used to test CAM therapies. The National Cancer Institute and the National Center for Complementary and Integrative Health (NCCIH) are sponsoring a number of clinical trials (research studies) at medical centers to test CAM therapies for use in cancer.

Conventional approaches to cancer treatment have generally been studied for safety and effectiveness through a scientific process that includes clinical trials with large numbers of patients. Less is known about the safety and effectiveness of complementary and alternative methods. Few CAM therapies have been tested using demanding scientific methods. A small number of CAM therapies that were thought to be purely alternative approaches are now being used in cancer treatment—not as cures, but as complementary therapies that may help patients feel better and recover faster. One example is acupuncture. According to a panel of experts at a National Institutes of Health (NIH) meeting in November 1997, acupuncture has been found to help control nausea and vomiting caused by chemotherapy and pain related to surgery. However, some approaches, such as the use of laetrile, have been studied and found not to work and to possibly cause harm.

The NCI Best Case Series Program (https://cam.cancer.gov/indentifying_novel_cam_therapies/best_case_series_program.htm) which was started in 1991, is one way CAM approaches that are being used in practice are being studied. The program is overseen by the NCI’s Office of Cancer Complementary and Alternative Medicine (OCCAM). Health care professionals who offer alternative cancer therapies submit their patients’ medical records and related materials to OCCAM. OCCAM carefully reviews these materials to see if any seem worth further research.

## Questions to Ask Your Health Care Provider About CAM

When considering complementary and alternative therapies, patients should ask their health care provider the following questions:

- What side effects can be expected?
- What are the risks related to this therapy?
- What benefits can be expected from this therapy?
- Do the known benefits outweigh the risks?
- Will the therapy affect conventional treatment?
- Is this therapy part of a clinical trial?
- If so, who is the sponsor of the trial?
- Will the therapy be covered by health insurance?

## To Learn More About CAM

National Center for Complementary and Integrative Health (NCCIH)

The National Center for Complementary and Integrative Health (NCCIH) at the National Institutes of Health (NIH) facilitates research and evaluation of complementary and alternative practices, and provides information about a variety of approaches to health professionals and the public.

- NCCIH Clearinghouse
- Post Office Box 7923 Gaithersburg, MD 20898–7923
- Telephone: 1-888-644-6226 (toll free)
- TTY (for deaf and hard of hearing callers): 1-866-464-3615
- E-mail: info@nccih.nih.gov
- Website: https://nccih.nih.gov

CAM on PubMed

NCCIH and the NIH National Library of Medicine (NLM) jointly developed CAM on PubMed (https://nccih.nih.gov/research/camonpubmed), a free and easy-to-use search tool for finding CAM-related journal citations. As a subset of the NLM's PubMed bibliographic database, CAM on PubMed features more than 230,000 references and abstracts for CAM-related articles from scientific journals. This database also provides links to the websites of over 1,800 journals, allowing users to view full-text articles. (A subscription or other fee may be required to access full-text articles.)

Office of Cancer Complementary and Alternative Medicine

The NCI Office of Cancer Complementary and Alternative Medicine (OCCAM) coordinates the activities of the NCI in the area of complementary and alternative medicine (CAM). OCCAM supports CAM cancer research and provides information about cancer-related CAM to health providers and the general public via the NCI website (https://www.cancer.gov/).

National Cancer Institute (NCI) Cancer Information Service

U.S. residents may call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, toll free at 1-800-4-CANCER (1-800-422-6237) Monday through Friday from 9:00 am to 9:00 pm. A trained Cancer Information Specialist is available to answer your questions.

Food and Drug Administration

The Food and Drug Administration (FDA) regulates drugs and medical devices to ensure that they are safe and effective.

- Food and Drug Administration
- 10903 New Hampshire Avenue
- Silver Spring, MD 20993
- Telephone: 1-888-463-6332 (toll free)
- Website: http://www.fda.gov

Federal Trade Commission

The Federal Trade Commission (FTC) enforces consumer protection laws. Publications available from the FTC include:

- Who Cares: Sources of Information About Health Care Products and Services
- Fraudulent Health Claims: Don’t Be Fooled

- Consumer Response Center
- Federal Trade Commission
- 600 Pennsylvania Avenue, NW
- Washington, DC 20580
- Telephone: 1-877-FTC-HELP (1-877-382-4357) (toll free)
- TTY (for deaf and hard of hearing callers): 202-326-2502
- Website: http://www.ftc.gov